# Pediatric Supportive Care (PDQ®)

Patient Version

This PDQ cancer information summary has current information about supportive care issues related to treatment in children and adolescents. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board.

## Overview

Key Points for This Section
- The goal of supportive care is to improve the quality of life for young cancer patients and their families.
- Cancer in children is different from cancer in adults.
- Children of different ages need different treatment and support.
- A child's circle of family and friends may be larger than it usually is for adults.
- Most decisions about care will be made by the child's parents or guardians.

Note: Information about growth and development and school and learning issues will be added to this summary in the future.

### The goal of supportive care is to improve the quality of life for young cancer patients and their families.

Most children with cancer can be cured. Every patient is different and the type of cancer, the child's age, and other factors affect how well treatment works. Cancer treatment for young patients can cause unwanted side effects and other problems during and after treatment. Early treatment of cancer symptoms and the side effects of therapy helps patients feel better, stay stronger, and cope with life after cancer. Supportive care improves the patient's physical, psychological, social, and spiritual quality of life.

Supportive care is given to children of all ages, including infants, children, adolescents, and young adults.

### Cancer in children is different from cancer in adults.

Cancer in children and young adults is different from cancer that develops later in life. Childhood cancers usually do not act like adult cancers and are not treated the same way:

- Treatment
  In general, treatments for childhood cancer use higher doses of chemotherapy and radiation than is used for adults. These treatments may also be given over a shorter amount of time than in adults. This is because children can receive more intense treatment (higher doses given over a shorter time) than adults can, before serious side effects occur.
- Side effects
  Some of the unwanted side effects of cancer treatments cause more harm to children than they do to adults. This is because children's bodies are still growing and developing, so cancer and its treatment are more likely to affect developing organs.
  Side effects of chemotherapy and radiation therapy may happen right away or weeks or years after treatment. Cancer treatment may also affect a child's growth or cause a second cancer to form. Problems that appear weeks or years after treatment are called late effects. Because of possible late effects, childhood cancer survivors need life-long follow-up. (See the PDQ summary on Late Effects of Treatment for Childhood Cancer for more information).
- Supportive care
  The types of supportive care given to children may be different from those used for adults. For example, certain medicines used to control symptoms in adults may not be safe for children.

### Children of different ages need different treatment and support.

The treatments and supportive care will be different for different age groups and will change as the child grows and develops. For some cancers, the prognosis (chance of recovery) and risk of late effects depend partly on the age of the child at the time of diagnosis or treatment. See CureSearch (http://www.curesearch.org/) for more information about treatment and support for different age groups.

### A child's circle of family and friends may be larger than it usually is for adults.

Even with a diagnosis of cancer, the child will still be going to school, spending time with friends and family, and enjoying many activities that were a part of life before cancer. The child's circle of family and friends may be large. In addition to parents, brothers, and sisters, many others may be closely involved in the child's everyday life. This includes grandparents, aunts, uncles, cousins, teachers, schoolmates, and friends. Everyone in a child's circle of family and friends are affected by the child's cancer diagnosis and treatment, and possible side effects of treatment.

### Most decisions about care will be made by the child's parents or guardians.

Children under the age of 18 don't have the legal right to make their own decisions about treatment. Their parents or guardians legally make these decisions for them. Decisions about treatment may be difficult because of this. There are ethical concerns about informed consent (the process of giving information about possible treatments and their risks and benefits, before treatment decisions are made). In the treatment of children, parents are informed and decide whether to give permission for the treatment. Whenever possible, it is best that the child be involved and agrees with decisions about treatment.

## Psychological Adjustment

Key Points for This Section
- Most children who have cancer adjust well.
- The type of cancer and the treatments used can affect adjustment.
- Depression and Suicide
  - A small number of children may have problems that lead to depression or suicide.
  - Certain antidepressant medicines may cause suicidal thoughts or actions in children, teenagers, and young adults.
  - It is important that survivors of childhood cancer have regular mental health check-ups as part of follow-up care.
- Post-traumatic Stress Disorder and Symptoms
  - Post-traumatic stress disorder (PTSD) is an anxiety disorder that occurs after serious physical injury or severe mental or emotional distress.
  - Children and teens with cancer, as well as parents and siblings, may be at risk for post-traumatic stress disorder.

### Most children who have cancer adjust well.

Cancer treatment is stressful on the child and the family. However, studies have shown that most children treated for cancer, and children who are long-term survivors of cancer, have few serious psychological problems.

The early days of treatment, when the child is often in the hospital, are usually the most stressful for the child and the family. The child may be anxious about being away from home and receiving new treatment. This anxiety usually decreases over time. Studies have reported that, in general, children treated for cancer have no differences from other children in self-esteem, hopefulness, depression, anxiety, or loneliness.

Children who have a lot of support from their family are less likely to have problems adjusting.

### The type of cancer and the treatments used can affect adjustment.

Some of the factors that may increase the risk of social, emotional, or behavioral problems include:

- Having leukemia, lymphoma, or a cancer or treatment that affects the central nervous system (brain and spinal cord).
- Having a stem cell transplant.
- Having family problems.
- Being younger than school age during treatment.

### Depression and Suicide

#### A small number of children may have problems that lead to depression or suicide.

Some studies have shown that physical and emotional distress related to cancer and its treatment can cause mental health problems in certain childhood cancer survivors. These problems include depression that needs treatment and can lead to suicide. Signs of depression include the following:

- Feeling empty, worthless, unloved, or that life isn't worth living.
- Feeling nervous, restless, or irritable.
- Changes in appetite.
- Low energy.
- Sleep problems.
- Decreased interest in activities.
- Increased crying.

See the PDQ Supportive Care summary for more information about Depression in children.

#### Certain antidepressant medicines may cause suicidal thoughts or actions in children, teenagers, and young adults.

Drugs called SSRIs (selective serotonin reuptake inhibitors) have been shown to decrease depression in young people. SSRIs usually have few side effects but they may cause suicidal thoughts or actions in young people (children, teenagers, and young adults). The Food and Drug Administration (FDA) has warned that young people up to age 25 who are taking SSRIs should be watched closely for signs that the depression is getting worse, especially suicidal thinking or behavior. Close monitoring is especially important during the first four to eight weeks of treatment. The patient, family, and health care provider should discuss the risks and benefits of using SSRIs to treat depression.

The side effects of SSRIs have not been studied in children, adolescents, or young adults with cancer.

#### It is important that survivors of childhood cancer have regular mental health check-ups as part of follow-up care.

Follow-up cancer care may be given by the cancer treatment doctor or the main provider, such as the family doctor. It is important that regular mental health check-ups be part of this follow-up care. A patient who shows signs of depression or other mental health problems during follow-up care may be referred to a therapist or other mental health specialist. Many survivors get help from therapists who are experts in helping people who are recovering from cancer.

### Post-traumatic Stress Disorder and Symptoms

#### Post-traumatic stress disorder (PTSD) is an anxiety disorder that occurs after serious physical injury or severe mental or emotional distress.

Being diagnosed with a life-threatening disease and receiving treatment for it is often traumatic. This trauma may cause a group of symptoms called post-traumatic stress disorder (PTSD). PTSD is defined as having certain symptoms following a stressful event that involved death or the threat of death, serious injury, or a threat to oneself or others.

People who have survived very stressful situations, such as military combat or natural disasters, may also have PTSD. PTSD can affect cancer survivors in the following ways:

- Reliving the time they were diagnosed and treated for cancer, in nightmares or flashbacks, and thinking about it all the time.
- Avoiding places, events, and people that remind them of the cancer experience.
- Being constantly overexcited, fearful, irritable, or unable to sleep, or having trouble concentrating.

Family problems, little or no social support from family or friends, and stress not related to the cancer may increase the chances of having PTSD.

Because avoiding places and persons connected to the cancer is part of PTSD, survivors with PTSD may not get the medical treatment they need.

Childhood cancer survivors who are diagnosed with PTSD are more likely to have depression and to have difficulty with common aspects of young adulthood, such as doing well in school, taking part in social activities, and reaching career goals.

#### Children and teens with cancer, as well as parents and siblings, may be at risk for post-traumatic stress disorder.

In children and teens with cancer, symptoms of PTSD may occur during treatment or after treatment has ended. Those who feel very uncertain about their disease and future may be more likely to have PTSD symptoms. Parents and siblings (brothers and sisters) of childhood cancer survivors are also at high risk for PTSD.

It is important that cancer survivors and their families receive information about the possible psychological effects of their cancer experience and about early treatment of symptoms of PTSD.

Follow-up cancer care may be given by the cancer treatment doctor or the main provider, such as the family doctor. It is important that regular mental health check-ups be part of this follow-up care. A patient who shows signs of PTSD or other mental health problems during follow-up care may be referred to a therapist or other mental health specialist. Many survivors get help from therapists who are experts in helping people who are recovering from cancer.

## Families

Key Points for This Section
- When a child has cancer, all members of the family are affected.
- Social support can help decrease the family's distress.

### When a child has cancer, all members of the family are affected.

Parents feel great distress when their child is diagnosed with a life-threatening disease. Over time, the level of distress may lessen. Each family is affected in its own way, and different members of the family will react in different ways.

Certain factors may increase the family's level of distress:

- The cancer patient is at a young age when diagnosed.
- The cancer treatments last for a long period of time.
- The child with cancer dies.

The entire family must adjust to changes in normal routine as the parents cope with the child's treatment, look for information, and try to also take care of the brothers and sisters. The parents' attention is focused on the child with cancer.

Brothers and sisters of the cancer patient need help to cope with their feelings of anxiety, loneliness, and fear. Brothers and sisters who are bone marrow (stem cell) donors for the cancer patient may have anxiety. Siblings who are not bone marrow donors may have school-related problems.

Although stress-related symptoms are common in siblings of childhood cancer patients, they sometimes report that their experience has made them more compassionate and that the cancer experience has brought their family closer together.

### Social support can help decrease the family's distress.

Parents who are working and who have support from family, friends, and the health care team usually have lower levels of distress and feel more positive about their child's experience. Social support programs, such as support groups and summer camps, help brothers and sisters cope with the illness more easily.

## End-of-Life Care

Key Points for This Section
- Parents are partners with doctors in decisions about their child's end-of-life care.
- There may be services that can help with end-of-life care for children.
- There are many important ways to improve end-of-life care for children.

### Parents are partners with doctors in decisions about their child's end-of-life care.

Even though new and better treatments have increased the chances of a cure or remission, some types of childhood cancer do not get better. When a child's cancer does not get better or comes back, parents may not be sure about whether to continue treatment and, if so, what kind.

Parents who are caring for a child at the end of life need a lot of support that includes family members and the child's health care team. The health care team can help parents understand how different types of treatment can affect their child's quality of life. Parents have to decide if they want their child to continue to receive treatment even if it is not likely to affect the cancer. They also have to decide if they want their child to take part in decisions about end-of-life care.

Parents have reported that they find the most support from cancer treatment doctors who:

- Give clear information.
- Communicate in a caring and sensitive way.
- Communicate directly with their child as needed.
- Let them know what to expect as their child nears death and help them get ready for it.

### There may be services that can help with end-of-life care for children.

Some medical centers that specialize in cancer care for children have services that help with palliative and end-of-life care. These support services may include:

- Pediatric palliative care team.
- Pain service.
- Hospice care.
- Psychological and social support team.
- Bereavement program.
- Complementary and alternative medicine (CAM) services.

Other services that are helpful but may be harder to find include:

- Programs for siblings of children who are receiving end-of-life care.
- Hospice programs that accept children who are still receiving chemotherapy.
- Clinical trials that combine complementary and alternative treatment with standard treatment.

Even when palliative care and end-of-life care support services are not available, cancer treatment doctors may suggest other options to parents. If parents have home health care support, many are able to plan and give their child end-of-life care at home. This can have the following positive effects:

- The child may not need to be admitted to the hospital as often.
- The parents feel that they have more control and are better able to accept their child's death.
- If the child does die in the hospital, he or she is less likely to die in an intensive care unit, which often uses invasive treatments.

### There are many important ways to improve end-of-life care for children.

When a child nears the end of life, the whole family needs compassionate medical, spiritual, emotional, and practical support. This includes the following types of help:

- Communication that is caring and sensitive to the needs of the child and the family. Communication should be based on the child's age and stage of development.
- Palliative care that includes ways to manage pain and other symptoms at the end of life. Medicines and non-drug treatments can relieve pain, agitation, itching, nausea, vomiting, and seizures. Platelet transfusions may be given to help prevent bleeding.
- Support for the emotional and spiritual needs of the child and the family that are based on differences among family members and on the family's cultural beliefs.
- Bereavement care which may include helping families create memories with the child, such as photo albums or handprints. It also helps the family to know what to expect at the time of death and in the days, weeks, and months that follow. Bereavement support sessions may be offered after the child's death. See the PDQ summary on Grief, Bereavement, and Coping With Loss for more information.
- Advance care planning to help the family make decisions about:
  - Types of treatment to be used.
  - Whether the family wants the child to die at home.
  - Whether the family wants hospice care.
  - Funeral arrangements.
  - Whether a Do Not Resuscitate (DNR) order will be in place.
  - Whether taking part in decisions would help the child.
- Information and advice from the health care team about medical, ethical, and legal issues.

Good end-of-life care includes treatment and support that is based on the special needs of the child and family and improves their quality of life.

See the PDQ summary on Last Days of Life for more information.

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about supportive care issues related to treatment in children and adolescents. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/about-cancer/treatment/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Pediatric Supportive Care. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/childhood-cancers/pediatric-care-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389483]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).